# Pruritus (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the causes and treatment of pruritus. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## General Information About Pruritus

Key Points for This Section
- Certain conditions, cancers, and blood disorders may cause pruritus.

Pruritus is an itchy feeling that makes you want to scratch your skin. It may occur without a rash or skin lesions. Pruritus sometimes feels like pain because the signals for itching and pain travel along the same nerve pathways. Scratching may cause breaks in the skin, bleeding, and infection. If your skin feels itchy, let your doctor know so it can be treated and relieved.

The way pruritus feels and how long it lasts is not the same in everyone.

The skin is the largest organ of the body. The most important job of skin is to protect against heat, sunlight, injury, and infection. The skin is also important to self-image and your ability to touch and be touched.

### Certain conditions, cancers, and blood disorders may cause pruritus.

Pruritus is a symptom of a certain condition, blood disorder, or a disease. These include:

- Cancer and conditions related to cancer.
- Liver, kidney, or thyroid disorders.
- Diabetes mellitus.
- HIV or parasite infection.
- Dry skin.
- Drug reactions.
- Conditions related to stress, anxiety, or depression.

The cause of pruritus is not always known.

## Causes of Pruritus in Cancer Patients

Key Points for This Section
- Certain cancer treatments may cause pruritus.
- Drugs may be used for supportive care.

### Certain cancer treatments may cause pruritus.

Cancer treatments that may cause pruritus include chemotherapy, radiation therapy, and immunotherapy (biologic therapy).

- When chemotherapy causes pruritus, it may be a sign that you are sensitive to the drugs being used.
- Radiation therapy can kill skin cells and cause dryness, burning, and itching as the skin peels off.
- Drugs used in immunotherapy may also cause dryness and itching.

Skin can become thin and dry because many of these therapies make your skin less able to make new cells and heal. Long-term dry skin may occur when hair and sweat gland function does not return to normal right after cancer treatment.

### Drugs may be used for supportive care.

Some of the drugs used to prevent or treat cancer symptoms may cause pruritus, including the following:

- Pain medicine such as opioids.
- Drugs for nausea and vomiting.
- Hormones such as estrogens, testosterone, or progestins.

## Assessment of Pruritus

Key Points for This Section
- Finding the cause of the itching is the first step in relieving pruritus.
- A physical exam, blood tests, and a chest x-ray are done to assess pruritus.

### Finding the cause of the itching is the first step in relieving pruritus.

Since pruritus is a symptom of a disease or condition, finding and treating the cause is the first step in bringing you relief.

### A physical exam, blood tests, and a chest x-ray are done to assess pruritus.

The following tests and procedures may be done to find the problem that is causing the itching:

- Physical exam and history: An exam of the body to check general signs of health, including checking for signs of disease, such as lumps or anything else that seems unusual. The doctor will check your skin for the following:
  - Signs of infection.
  - Signs of a drug reaction.
  - Redness, dryness, scratches, or lesions.
  - Abnormal color, texture, or temperature.
  A history of your health habits, past illnesses, and treatments will also be taken. You may be asked about the following:
  - When the pruritus started, how long it lasts, how bad it is, and what part of your body is itchy.
  - How it affects your daily activities and sleep.
  - What makes the itching better or worse.
  - Whether other family members or pets are affected.
  - Whether you have had pruritus before.
  - Current cancer treatment or past history of cancer.
  - Other diseases you have now or had in the past and their treatment.
  - Pain medicines, antibiotics, or other drugs you are taking, including illegal drugs.
  - Whether your diet is healthy and you drink enough fluids.
  - Social history (hobbies, job, sexual history, and travel).
  - How you care for your skin.
  - Your emotional health.
- Blood chemistry studies: A procedure in which a blood sample is checked to measure the amounts of certain substances released into the blood by organs and tissues in the body. An unusual (higher or lower than normal) amount of a substance can be a sign of disease. These blood tests include:
  - Kidney function tests.
  - Liver function tests.
  - Lactate dehydrogenase test.
  - Thyroid function tests.
- Complete blood count (CBC) with differential: A procedure in which a sample of blood is drawn and checked for the following:
  - The number of red blood cells and platelets.
  - The number and type of white blood cells.
  - The amount of hemoglobin (the protein that carries oxygen) in the red blood cells.
  - The portion of the blood sample made up of red blood cells.
- Sedimentation rate: A procedure in which a sample of blood is drawn and checked for the rate at which the red blood cells settle to the bottom of the test tube. The sedimentation rate is a measure of how much inflammation is in the body. A higher than normal sedimentation rate may be a sign of lymphoma or another condition. Also called erythrocyte sedimentation rate, sed rate, or ESR.
- Chest x-ray: An x-ray of the organs and bones inside the chest. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body.

Depending on the results, further tests, such as a skin biopsy, may be done to diagnose the problem and decide on treatment.

## Treatment of Pruritus

Key Points for This Section
- Treatment of pruritus in cancer patients involves learning what the triggers are and taking steps to avoid them.
- Different types of treatment are used to help treat pruritus.
  - Self-care
  - Over-the-counter treatments
  - Prescription drugs applied to the skin
  - Systemic therapies
  - Other drug therapies
  - Comfort measures

### Treatment of pruritus in cancer patients involves learning what the triggers are and taking steps to avoid them.

It is important for you and for caregivers to know what triggers itching, such as dry skin or hot baths, so you can take steps to prevent it. You may need more than one type of treatment to relieve or prevent pruritus, protect your skin, and keep you comfortable.

Good nutrition is very important for healthy skin. A good diet includes a balance of proteins, carbohydrates, fats, vitamins, minerals, and fluids. Eating a balanced diet and drinking plenty of fluids helps your skin stay healthy. It is best to drink at least 3 liters (about 100 ounces) of fluid each day, but this may not be possible for everyone.

Washing the skin every day or every two days is important to help remove dirt and keep the skin healthy.

### Different types of treatment are used to help treat pruritus.

#### Self-care

Self-care includes avoiding pruritus triggers and taking good care of your skin.

Pruritus triggers include:

- Dehydration caused by fever, diarrhea, nausea and vomiting, or low fluid intake.
- Hot baths or bathing more than once a day, or for longer than 30 minutes.
- Bubble baths or soaps with detergents.
- Reusable scrubbing sponges for the face or loofahs for the body.
- Scents, fragrances, and perfumes.
- Adding oil at the beginning of the bath.
- Dry indoor air.
- Laundry detergent with scents, dyes, or preservatives.
- Fabric softener sheets.
- Tight clothes or clothes made of wool, synthetics, or other harsh/scratchy fabric.
- Underarm deodorants or antiperspirants.
- Skin care or cosmetics with scents, dyes, or preservatives.
- Emotional stress.

Ways to help lessen itching include:

- Using unscented, soothing creams or ointments.
- Bathing in slightly warm water no more than 30 minutes daily or every other day.
- Using mild skin cleansers (non-soap) or soaps made for sensitive skin (such as Cetaphil cleanser, Dove for Sensitive Skin, Oilatum, Basis).
- Adding oil and soap at the end of a bath or adding a colloidal oatmeal treatment early to the bath.
- Using soap only for dirty areas; otherwise water is good enough.
- Gently washing, if needed, with a clean, fresh, soft cotton washcloth.
- Rinsing all soap or other residue from bathing with fresh, slightly warm water.
- Drying off by patting skin instead of rubbing.
- Keeping home air cool and humid (including use of a humidifier).
- Washing sheets, clothes, and underwear in mild soap or baby soap that contains no scents, dyes, or preservatives (such as Dreft, All Free Clear, Tide Free and Gentle). Adding vinegar (one teaspoon per quart of water) to rinse water removes traces of detergent.
- Using liquid fabric softener that gets rinsed out in the wash (such as All Free Clear Fabric Softener) or avoiding fabric softener altogether.
- Using blankets that are soft, such as cotton flannel.
- Wearing loose-fitting clothes and clothes made of cotton or other soft fabrics.
- Using distraction, music therapy, relaxation, or positive imagery.

#### Over-the-counter treatments

Some over-the-counter treatments (medicines that can be bought without a prescription) help prevent or relieve pruritus. However, you should read labels carefully to look for ingredients that may trigger skin reactions, including alcohol, topical antibiotics, and topical anesthetics.

##### Cornstarch and talc

Cornstarch can help prevent itching of dry skin caused by radiation therapy but should not be used where skin is moist. When cornstarch becomes moist, fungus may grow. Avoid using it on areas close to mucous membranes, such as the vagina or rectum, in skin folds, and on areas that have hair or sweat glands.

Some powders and antiperspirants, such as those that contain talc and aluminum, cause skin irritation during radiation therapy and should be avoided when you're receiving radiation treatment.

For itching not related to radiation therapy, talc-based treatments may be better than cornstarch-based treatments, especially where two skin surfaces touch or rub together (such as the underarm or between fingers or toes).

##### Creams and lotions

If pruritus is related to dry skin, emollient creams or lotions may be used. Emollients help soothe and soften the skin and increase moisture levels in the skin. It is important to know the ingredients in these creams and lotions because some may cause skin reactions. Such ingredients include:

- Petrolatum, which is not well absorbed in skin treated with radiation therapy and may build up too much or be hard to remove.
- Lanolin, which may cause allergic reactions in some people.
- Mineral oil, which may be combined with petrolatum and lanolin in creams and lotions and may be an ingredient in bath oils.

Other ingredients added to emollients, such as thickeners, preservatives, fragrances, and colorings, may also cause allergic skin reactions.

Emollient creams or lotions are applied at least two or three times a day and after bathing. Gels with a local anesthetic (0.5%–5% lidocaine) can be used on some small areas as often as every 2 hours if you aren't sensitive to alcohol ingredients.

To soothe or cool areas of severe pruritus, over-the-counter products containing menthol, camphor, pramoxine, or capsaicin can be used. These products soothe, cool, and decrease the urge to scratch. Capsaicin-based therapies may work best in pruritus related to nerve signals.

#### Prescription drugs applied to the skin

Your doctor may prescribe topical steroids (steroids applied to the skin) to reduce itching, but they cause thinning of the skin and make it more sensitive. They should be used only for pruritus related to inflammation. Topical steroids should not be used on skin being treated with radiation therapy, but may be used to relieve inflamed skin after radiation treatment ends.

For xerosis (abnormally dry skin) or keratoderma (a horn-like skin condition), moisturizer creams may be used to seal in moisture and peel off scaly layers of skin. Humectants with ingredients like salicylic acid, ammonium lactate, or urea may improve skin smoothness but can cause stinging if applied to broken skin.

#### Systemic therapies

Systemic therapies travel through the bloodstream and reach and affect cells all over the body. They may help treat the condition causing your pruritus or help control your symptoms.

Your doctor may prescribe an antibiotic if your pruritus is caused by an infection. You may also be given an oral antihistamine to relieve itching. A larger dose may sometimes be used at bedtime to help you sleep.

#### Other drug therapies

If other drug treatments do not work to control pruritus, sedatives and antidepressants are sometimes used.

Aspirin may relieve pruritus in some patients with polycythemia vera but may increase pruritus in others. Cimetidine alone or combined with aspirin may help control pruritus in patients with Hodgkin lymphoma and polycythemia vera.

#### Comfort measures

Other steps may be taken to help you keep from scratching and stop the itch-scratch-itch cycle. These may include:

- Applying emollients to help prevent skin breakdown.
- A cool washcloth or ice held over the itchy area.
- Firm pressure on the itchy area, on the same area on the opposite side of the body, and at acupressure points.
- Rubbing or vibration on the itchy area.
- Transcutaneous electrical nerve stimulation (TENS) or acupuncture.

## To Learn More About Pruritus

For more information from the National Cancer Institute about pruritus, see the following:

- Skin and Nail Changes During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/skin-nail-changes)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the causes and treatment of pruritus. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Pruritus. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/skin-nail-changes/pruritus-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389398]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).